# Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood central nervous system atypical teratoid and rhabdoid tumor. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor

Key Points for This Section
- Central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT) is a cancer that forms in the tissues of the brain.
- Certain genetic changes may increase the risk of AT/RT.
- The symptoms of AT/RT are not the same in every person.
- CNS AT/RT is found with tests that examine the brain and spinal cord.
- Childhood AT/RT is diagnosed using a biopsy, and the tumor may be removed in the same surgery.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT) is a cancer that forms in the tissues of the brain.

Central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT) is a very rare, fast-growing cancer that begins in the brain and spinal cord. It usually occurs in children aged 3 years and younger, although it can occur in older children and adults.

About half of these tumors form in the cerebellum or brain stem. The cerebellum is the part of the brain that controls movement, balance, and posture. The brain stem controls breathing, heart rate, and the nerves and muscles used in seeing, hearing, walking, talking, and eating. AT/RT can also begin in other parts of the brain and spinal cord.

Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.

Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.

### Certain genetic changes may increase the risk of AT/RT.

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop AT/RT. And it will develop in some children who don't have a known risk factor.

AT/RT may be linked to changes in the tumor suppressor genes SMARCB1 or SMARCA4. Tumor suppressor genes make a protein that helps control how and when cells grow. Changes in the DNA of tumor suppressor genes like SMARCB1 or SMARCA4 may lead to cancer.

The changes in the SMARCB1 or SMARCA4 genes may be inherited (passed on from parents to offspring). When this gene change is inherited, tumors may form in two parts of the body at the same time (for example, in the brain and the kidney). For children with AT/RT, genetic counseling (a discussion with a trained professional about inherited diseases and a possible need for gene testing) may be recommended.

Talk with your child's doctor if you think your child may be at risk.

### The symptoms of AT/RT are not the same in every person.

Symptoms depend on:

- the child's age
- where the tumor has formed

Because AT/RT is fast growing, symptoms may develop quickly and get worse over a period of days or weeks. It's important to check with your child's doctor if your child has:

- a morning headache or headache that goes away after vomiting
- nausea and vomiting
- unusual sleepiness or change in activity level
- loss of balance, lack of coordination, or trouble walking
- an increase in head size (in infants)
- pain, tingling, numbness, or paralysis in the face

These symptoms may be caused by problems other than AT/RT. The only way to know is to see your child's doctor.

### CNS AT/RT is found with tests that examine the brain and spinal cord.

If your child has symptoms that suggest AT/RT, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family health history and do a physical exam, including a neurological exam. Depending on these results, they may recommend other tests. If your child is diagnosed with AT/RT, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose AT/RT may include:

- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the brain and spinal cord. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Lumbar puncture is a procedure used to collect cerebrospinal fluid (CSF) from the spinal column. This is done by placing a needle between two bones in the spine and into the lining around the spinal cord to remove a sample of the CSF. The sample of CSF is checked under a microscope for signs of tumor cells. The sample may also be checked for the amounts of protein and glucose. This procedure is also called an LP or spinal tap.
- SMARCB1 and SMARCA4 gene testing is a laboratory test in which a sample of blood or tissue is tested for certain changes in the SMARCB1 and SMARCA4 genes. Children with AT/RT may be eligible for gene testing through the Molecular Characterization Initiative.
  The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs, such as the kidney, and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure is done to check for tumors that may also have formed in the kidney.

### Childhood AT/RT is diagnosed using a biopsy, and the tumor may be removed in the same surgery.

If doctors think there might be a brain tumor, a biopsy may be done to remove a sample of tissue. For brain tumors, the biopsy can be done by removing part of the skull or making a small hole in the skull and using a needle or surgical device to remove a sample of tissue. Sometimes, when a needle is used, it is guided by a computer to remove the tissue sample. A pathologist views the tissue under a microscope to look for cancer cells. If cancer cells are found, the doctor may remove as much tumor as safely possible during the same surgery. The pathologist checks the cancer cells to find out the type of brain tumor. It is often difficult to completely remove AT/RT because of where the tumor is in the brain and because it may already have spread at the time of diagnosis. The piece of skull is usually put back in place after the procedure.

Craniotomy. An opening is made in the skull and a piece of the skull is removed to show part of the brain.

Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.

The following test may be done on the sample of tissue that is removed:

- Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.

### Certain factors affect prognosis (chance of recovery) and treatment options.

If your child has been diagnosed with AT/RT, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on:

- whether your child has certain inherited gene changes
- whether the tumor has certain gene changes
- your child's age
- the amount of tumor remaining after surgery
- whether the cancer has spread to other parts of the brain and spinal cord or to the kidney at the time of diagnosis
- whether the cancer has just been diagnosed or has recurred (come back)

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Stages of Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor

Key Points for This Section
- There is no standard staging system for central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).

### There is no standard staging system for central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).

The process used to find out if cancer has spread to other parts of the body is called staging. There is no standard staging system for central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).

For treatment, this tumor is grouped as newly diagnosed or recurrent. Treatment depends on:

- your child's age
- how much cancer remains after surgery to remove the tumor
- whether the cancer has spread to other parts of the CNS
- the results of tests and procedures done to diagnose the cancer

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).
- Children with AT/RT should have their treatment planned by a team of health care providers who are experts in treating cancer in children.
- Childhood brain tumors may cause symptoms that begin before the cancer is diagnosed and continue for months or years.
- The following types of treatment may be used:
  - Surgery
  - Chemotherapy
  - Radiation therapy
  - Stem cell transplant
  - Clinical trials
- Treatment for childhood CNS AT/RT may cause side effects.
- Follow-up care may be needed.
- Resources and support are available to help you cope with your child's cancer.

### There are different types of treatment for children with central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).

There are different types of treatment for children with AT/RT. You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the cancer is located and your child's age and overall health.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Children with AT/RT should have their treatment planned by a team of health care providers who are experts in treating cancer in children.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of AT/RT. The pediatric oncologist works with other health care providers who are experts in treating children with CNS cancer and also specialize in other areas of medicine. Other specialists may include:

- pediatrician
- pediatric neurosurgeon
- radiation oncologist
- neurologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- geneticist or genetic counselor
- fertility specialist

### Childhood brain tumors may cause symptoms that begin before the cancer is diagnosed and continue for months or years.

Symptoms caused by the tumor may begin before diagnosis. These signs or symptoms may continue for months or years. It is important to talk with your child's doctors about symptoms caused by the tumor that may continue after treatment.

### The following types of treatment may be used:

#### Surgery

Surgery is used to treat CNS AT/RT. Learn more about how this tumor is diagnosed.

After the doctor removes all the cancer that can be seen at the time of the surgery, most children will receive chemotherapy and possibly radiation therapy to try to kill any cancer cells that are left. Treatment given after surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Chemotherapy

Chemotherapy uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cells or stops them from dividing. Chemotherapy may be given with other types of treatments.

Chemotherapy for AT/RT is injected into a vein. When given this way, the drugs enter the bloodstream and can reach tumor cells throughout the body. High doses of some chemotherapy drugs given into a vein can cross the blood-brain barrier and reach the tumor. Chemotherapy for AT/RT is also placed directly into the cerebrospinal fluid (intrathecal chemotherapy). Combination chemotherapy uses more than one anticancer drug.

Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.

Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.

Chemotherapy drugs used alone or in combination to treat AT/RT in children include:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
- thiotepa (https://www.cancer.gov/about-cancer/treatment/drugs/thiotepa)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, and common side effects at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Because radiation therapy can affect growth and brain development in young children, especially children who are 3 years old or younger, the dose of radiation therapy may be lower than in older children.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Stem cell transplant

High doses of chemotherapy are given to kill cancer cells. This treatment destroys healthy cells, including blood-forming cells. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given back to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

#### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can find clinical trials for people with atypical teratoid/rhabdoid tumor at Treatment Clinical Trials for Atypical Teratoid/Rhabdoid Tumor (https://www.cancer.gov/research/participate/clinical-trials/disease/atypical-teratoid-rhabdoid-tumor/treatment) or use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for childhood CNS AT/RT may cause side effects.

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated. Some tests will be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

### Resources and support are available to help you cope with your child's cancer.

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Treatment of Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor

For information about the treatments listed below, see the Treatment Option Overview section.

There is no standard treatment for children with newly diagnosed central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT). Because AT/RT is fast-growing, a combination of treatments is usually given.

After surgery to remove the tumor, treatment for AT/RT may include combinations of:

- chemotherapy
- radiation therapy
- high-dose chemotherapy with stem cell transplant

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor

For information about the treatments listed below, see the Treatment Option Overview section.

There is no standard treatment for children with recurrent central nervous system (CNS) atypical teratoid/rhabdoid tumor (AT/RT).

Treatment for recurrent childhood AT/RT may include:

- radiation therapy
- palliative treatment to improve quality of life

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More about Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor and Other Childhood Brain Tumors

For more information about childhood central nervous system atypical teratoid/rhabdoid tumor and other childhood brain tumors, visit:

- Pediatric Brain Tumor Consortium (PBTC) (https://www.pbtc.org/)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood central nervous system atypical teratoid and rhabdoid tumor. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/brain/patient/child-cns-atrt-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389341]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).